# Stomach (Gastric) Cancer Causes and Risk Factors

Patient Version

This PDQ cancer information summary has current information about stomach (gastric) cancer prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## Stomach Cancer Causes and Risk Factors

Stomach cancer is caused by certain changes to the way stomach cells function, especially how they grow and divide into new cells. There are many risk factors for stomach cancer, but many do not directly cause cancer. Instead, they increase the chance of DNA damage in cells that may lead to stomach cancer. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Some risk factors for stomach cancer, like tobacco use, can be changed. However, risk factors also include things people cannot change, like their age and family history. Learning about risk factors for stomach cancer is important because it can help you make choices that might prevent or lower your risk of getting it.

### Who gets stomach cancer

Stomach cancer is the fifth most common cancer worldwide. It is more common in countries in East Asia, Western Asia, Eastern Europe, and South America than in the United States and other Western countries.

Anyone can get stomach cancer. In the United States, the disease occurs more often among Black, Hispanic, Asian or Pacific Islander, and American Indian or Alaska Native individuals than among White individuals. Males are nearly twice as likely as females to be diagnosed with stomach cancer, and Black males are nearly twice as likely as White males to die of it. In recent years, stomach cancer rates have been increasing in younger females, particularly among Hispanic females. Stomach cancer can be diagnosed at any age, but the risk increases as a person gets older.

### Risk factors for stomach cancer

There are several risk factors for stomach cancer. Different risk factors may increase the risk of cancer in different parts of the stomach. For example, Helicobacter pylori (H. pylori) infection increases the risk of cancer in the lower and middle part of the stomach, while obesity and gastroesophageal reflux disease (GERD) increase the risk of cancer in the upper stomach.

#### H. pylori infection

Chronic infection of the mucosal layer of the stomach with H. pylori is a major risk factor for stomach cancer. This bacterium spreads from person to person through direct contact with saliva, vomit, or stool. Although many people with chronic H. pylori infections do not have symptoms, some develop stomach ulcers or an inflammation of the stomach called atrophic gastritis. In some people, atrophic gastritis leads to increasingly severe changes in the stomach lining and eventually to stomach cancer or gastric MALT lymphoma (learn more at What Is Stomach Cancer? (https://www.cancer.gov/types/stomach)). Treatment of H. pylori infections reduces the risk of these types of stomach cancer.

#### Other medical conditions

The risk of stomach cancer is increased in people who have:

- chronic atrophic gastritis (thinning of the stomach lining caused by long-term inflammation of the stomach)
- atrophic gastritis with intestinal metaplasia (a condition in which the cells that line the stomach are replaced by cells that normally line the intestines)
- Epstein-Barr virus infection
- pernicious anemia (an autoimmune condition in which the intestines can’t properly absorb vitamin B12, resulting in a low red blood cell count)
- obesity (excess body weight)
- gastroesophageal reflux disease (a condition in which stomach acid repeatedly flows back into the esophagus)

#### Genetics and family history

The risk of stomach cancer is increased, sometimes to very high levels, in people who have:

- a first-degree relative (parent, sibling, or child) who has had stomach cancer
- a family cancer syndrome, such as:
  - familial adenomatous polyposis
  - familial intestinal gastric cancer (FIGC), a type of stomach cancer that runs in families but does not have a known genetic cause
  - gastric adenocarcinoma and proximal polyposis of the stomach (GAPPS) (learn more about GAPPS (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-digestive-system-tumors/gastric-adenocarcinoma-and-proxymal-polyposis))
  - hereditary diffuse gastric cancer (HDGC) (learn more about HDGC (https://www.cancer.gov/pediatric-adult-rare-tumor/rare-tumors/rare-digestive-system-tumors/hereditary-diffuse-gastric-cancer))
  - juvenile polyposis syndrome
  - Li-Fraumeni syndrome
  - Lynch syndrome (also called hereditary nonpolyposis colon cancer and HNPCC)
  - Peutz-Jeghers syndrome
- type A blood (learn more at Blood Typing (https://medlineplus.gov/ency/article/003345.htm) from MedlinePlus)

#### Diet

Eating a diet that is low in fruits and vegetables or that is high in salted, smoked, or poorly preserved foods may increase the risk of stomach cancer.

#### Tobacco use

People who smoke have a higher risk of stomach cancer than nonsmokers. Smoking also makes treatment for H. pylori infection less effective. Smokers who stop smoking lower their risk of having stomach cancer over time. Learn about different tools to help you quit smoking and how to use them. (https://smokefree.gov/)

#### Environmental and occupational exposures

The risk of stomach cancer is increased in people who:

- work in the rubber or coal industry
- have been exposed to very high levels of radiation

Having one or more of these risk factors does not necessarily mean you will get stomach cancer. Many people with risk factors never develop stomach cancer, whereas others with no known risk factors do. Talk with your doctor if you think you might be at increased risk.

Stomach cancer screening or preventive surgery may be available to people at very high risk of stomach cancer, such as those with certain genetic conditions or family histories. Learn about stomach cancer screening (https://www.cancer.gov/types/stomach/screening).